# Financial Toxicity (Financial Distress) and Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of cancer and financial toxicity (financial distress). It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Financial Toxicity (Financial Distress) and Cancer Treatment

Key Points for This Section
- Financial toxicity describes problems a patient has related to the cost of medical care.
- Several studies show that people with cancer and survivors are more likely to have financial toxicity than are people without cancer.
- The level of financial toxicity you may have will depend on several factors in your household.
- Cancer treatment can affect your ability to work and pay your bills.

### Financial toxicity describes problems a patient has related to the cost of medical care.

The terms financial toxicity and financial distress are used to describe how out-of-pocket costs can cause financial problems for a patient. Out-of-pocket costs are what you pay for your medical care that is not covered by your health insurance. Out-of-pocket costs include the following:

- Copayments: Amount you pay for each health care service, such as a doctor appointment or prescription.
- Deductibles: Amount you pay for your medical care before your health insurance plan begins to pay.
- Coinsurance: Percentage of costs you pay for a service that your health insurance covers after you have paid your deductible; for example, you pay 20% and your insurance pays 80%.

These costs can be for hospital stays, outpatient services (procedures and tests that can be done without staying overnight in the hospital), medical appointments, and prescription drugs.

Cancer survivors usually report higher out-of-pocket spending than people who have not had cancer. Some cancer survivors report spending more than 20% of their annual income on medical care.

Financial toxicity may also be called financial distress, financial stress, financial hardship, financial burden, economic burden, and economic hardship.

There have been no randomized clinical trials studying financial toxicity in people with cancer. The information in this summary is mainly based on studies that only included survivors and people with certain cancers, so it may not apply to all people with cancer.

### Several studies show that people with cancer and survivors are more likely to have financial toxicity than are people without cancer.

Cancer is one of the most expensive medical conditions to treat in the United States. People with cancer may receive multiple types of treatments, including radiation therapy and systemic treatment, and may be hospitalized. People with cancer who have health insurance are paying higher premiums than in the past. They are also paying more for copayments, deductibles, and coinsurance.

Compared to 10 years ago, patients receive more expensive chemotherapy, immunotherapy, and other new types of treatments. Copayments for prescription drugs covered by health insurance may be more for higher priced drugs or brand name drugs (versus generic drugs) and may increase over time. These copayments and coinsurance for drugs may cause financial toxicity even for people with cancer who have health insurance.

Cancer survivors may have financial problems many years after they are diagnosed. This is because they may be paying for ongoing cancer treatment or care for late effects from their treatment.

### The level of financial toxicity you may have will depend on several factors in your household.

When you are diagnosed with cancer, the following factors in your household may affect your risk of financial toxicity:

- whether you make the most money for your household
- how much money other people in your household make
- how much debt you had before you were diagnosed with cancer
- your assets
- costs related to your cancer
- how the cancer and its treatment affect your ability to work
- whether you have health and disability insurance and what they cover

You and your family may have the following problems because of your cancer diagnosis:

- less income and assets
- debt because of the cost of your cancer care
- trouble paying for housing, food, and bills
- bankruptcy

### Cancer treatment can affect your ability to work and pay your bills.

Having cancer may make it hard for you to do the physical and mental tasks for your job. You may miss time at work, or not be able to work at all. One study showed that working people who are getting cancer treatment missed about 22 more workdays a year than those who did not have any cancer treatment. Not being able to work may affect your employment-based health insurance (this is when part or all of your premium is paid by your employer).

You may also worry and have stress about paying medical bills related to your cancer. People with cancer have reported worrying about wages lost for sick time or going to medical appointments. You may also have difficulty and stress when trying to understand complex medical bills.

## Risk Factors Related to Financial Toxicity (Financial Distress)

Key Points for This Section
- The type of cancer you have, how severe it is, and the treatment you receive can affect your risk of financial toxicity.
- Your age, race and ethnicity, income, and whether you have a job can affect your risk of financial toxicity.
- The type of health insurance that you have, or not having health insurance, can affect your risk of financial toxicity.

### The type of cancer you have, how severe it is, and the treatment you receive can affect your risk of financial toxicity.

Patients with the following types of diseases have a higher risk of financial toxicity:

- advanced cancer
- recurrent cancer
- cancer that has a poor prognosis
- more than one type of cancer
- a chronic disease (such as heart disease or diabetes) in addition to cancer

This is partly because their cancer and treatment may keep them from having a job.

Patients who have been treated with chemotherapy and radiation therapy are more likely to have higher out-of-pocket costs and financial toxicity than patients who have not had those treatments.

### Your age, race and ethnicity, income, and whether you have a job can affect your risk of financial toxicity.

Studies have shown that younger age at the time of cancer diagnosis increases the risk of financial toxicity. Younger people with cancer may have financial toxicity because of the following:

- a lack of savings and assets
- other financial responsibilities, such as raising children
- not having health insurance ( people younger than 65 years are not eligible for Medicare) or having a high-deductible health insurance plan with high out-of-pocket costs

Survivors of childhood cancer may be more likely to have financial problems. A cancer diagnosis during childhood may disrupt education and limit job opportunities. Childhood cancer survivors may have higher out-of-pocket costs than their siblings due to the risk of second cancers and lasting effects of their cancer treatment.

Some studies have shown that people who belong to racial and ethnic minority groups may be more likely to have financial problems after being diagnosed with cancer. More research needs to be done in this area.

Patients from lower-income households have a higher risk of financial toxicity than patients from higher-income households. Losing a job has also been shown to be a risk factor for debt and bankruptcy.

Several studies have shown that people with cancer may experience:

- loss of a job
- change in job status, such as switching to part-time work or taking extended leave
- difficulty returning to work
- earning less income
- general loss of productivity

### The type of health insurance that you have, or not having health insurance, can affect your risk of financial toxicity.

If you do not have health insurance, you have a high risk of financial toxicity, especially because cancer costs are rising. However, even if you have health insurance, you may still have high out-of-pocket costs for your cancer care.

If you are enrolled in Medicare, you can also enroll in additional plans that can help reduce your out-of-pocket costs. You can choose to get supplemental insurance that can help cover medical costs that your regular insurance plan does not cover, and you can enroll in Medicare Part D, which is a Medicare plan that covers prescription drugs.

One study found that patients who have public health insurance (Medicaid or Medicare) have a higher risk of financial toxicity compared to patients who have private health insurance. Patients with public health insurance may also have fewer savings and assets, which is a risk factor for financial toxicity.

## Effects of Financial Toxicity (Financial Distress) on People with Cancer

Key Points for This Section
- Patients may not take their medicine as directed so that they can save money on copayments.
- Patients who have financial toxicity may have a lower quality of life.
- Financial toxicity may lead to debt, bankruptcy, and other harmful financial events.
- Informal caregivers often share in the experience of financial toxicity.

### Patients may not take their medicine as directed so that they can save money on copayments.

Some patients have reported skipping doses or taking less medicine than prescribed, to make their prescription last longer and save money. Patients have also reported not filling a prescription because of the cost.

The higher the copayment, the less likely patients are to take their medicine as directed.

### Patients who have financial toxicity may have a lower quality of life.

Studies have shown that patients who have financial toxicity reported having a lower quality of life, more symptoms, and more pain. One study showed that some patients felt financial toxicity was more severe than physical, emotional, social, or family distress.

In addition to lower quality of life, patients who have financial toxicity are also more likely to report:

- poor physical health
- poor mental health, including feeling depressed
- being unsatisfied with social activities and relationships
- worrying that their cancer may come back

### Financial toxicity may lead to debt, bankruptcy, and other harmful financial events.

One study found that people with cancer experienced more harmful financial events, including:

- an inability to pay bills
- past-due mortgage payments
- foreclosures or repossessions of property

In another study, some cancer survivors reported the following problems related to financial toxicity:

- worrying about paying large bills related to cancer
- going into debt
- filing for bankruptcy

You may have to do some of the following to help pay for your medical care:

- use your savings
- borrow money
- spend less on leisure activities, food, clothing, and utilities
- sell your stocks, investments, possessions, or property
- move to lower-cost housing

### Informal caregivers often share in the experience of financial toxicity.

Family members and friends may provide informal care for people with cancer. They often share in the experience of financial toxicity by spending money on food, medicine, and other things the patient needs. They may also need to take time off from work to provide care for the patient. These actions may lead to a higher sense of burden, lower quality of life, and poorer mental health for the caregiver.

## Ways to Reduce Financial Toxicity (Financial Distress)

Key Points for This Section
- There may be ways to reduce financial toxicity.

### There may be ways to reduce financial toxicity.

The following are being studied as possible ways to reduce financial toxicity:

- meeting with a financial navigator who will teach you about the health insurance plans and cost-saving methods for treatments that you are eligible for
- hospitals posting their prices so that health care professionals and patients know the costs when making decisions about which tests and treatments to use
- introducing value-based pricing so that patients can choose higher-value treatments with lower out-of-pocket costs
- reforming health insurance by passing policies that help people with cancer

See Managing Costs and Medical Information (https://www.cancer.gov/about-cancer/managing-care/track-care-costs) for more information about ways to manage the costs of your cancer care.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of cancer and financial toxicity (financial distress). It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Financial Toxicity (Financial Distress) and Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/managing-care/track-care-costs/financial-toxicity-pdq. Accessed <MM/DD/YYYY>. [PMID: 28682576]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).